# Cancer Genetics Overview (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer genetics. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Cancer risk is influenced by multiple factors, including genetics, environment, medical history, and lifestyle. The content in PDQ Cancer Genetics summaries covers evidence on inherited genetic risk factors, including the cancer risks and management associated with hereditary cancer syndromes (including pathogenic variants in specific genes that cause them). Knowledge of genetic components that contribute to cancer risk rapidly improves our understanding of cancer biology and helps identify individuals with increased cancer risk. These findings enhance the ability to characterize malignancies, establish treatment tailored to the molecular fingerprint of specific cancers, and lead to the development of new therapeutic modalities. As a consequence, this expanding knowledge base has implications for all aspects of cancer management, including prevention, screening, and treatment.

Family histories of cancer can help identify individuals who are at increased risk of developing cancer and select candidates for hereditary cancer genetic testing. Genetic testing results can indicate that individuals have increased cancer risk or that a cancer has an underlying genetic predisposition.

## Cancer Genetics Concepts and Terminology

The term, variant, describes a difference (i.e., genetic change) between an individual or a group of individuals who are being studied and the DNA reference sequence. The term, mutation, is sometimes still used in patient settings. Variants are classified as benign (harmless), likely benign, of uncertain significance, likely pathogenic, or pathogenic (affects gene function and is disease-associated). For more information, see Table 1.

The cancers associated with pathogenic variants and the risk estimates to develop cancer continue to be updated based on current research. Risk updates even occur for genes that have been studied for many years, like the Lynch syndrome genes.

This section discusses concepts and terminology used in hereditary cancer genetics. For additional terms, see the National Cancer Institute's Dictionary of Genetics Terms (https://www.cancer.gov/publications/dictionaries/genetics-dictionary/).

### Levels of Cancer Risk

Different hereditary cancer genes are associated with varying levels of cancer risk. This cancer risk can also vary among pathogenic/likely pathogenic (P/LP) variants in the same gene. Rare genetic variants are generally associated with higher cancer risks than common genetic variants. This is depicted in Figure 1.

In some genes, P/LP variants increase an individual's risk of developing cancer at a younger age than that typically seen in the general population.

Cancer risk is multifactorial. It is influenced by genetic, environmental, medical, and lifestyle factors. These nongenetic factors impact cancer risk in individuals who carry a P/LP variant in genes like BRCA1 or BRCA2. For more information, see the Introduction and the Polygenic risk scores for breast and ovarian cancer sections in Genetics of Breast and Gynecologic Cancers.

Figure 1. Genetic architecture of cancer risk. This graph depicts the general finding of a low relative risk associated with common, low-penetrance genetic variants, such as single-nucleotide variants identified in genome-wide association studies. It also shows a higher relative risk associated with rare, high-penetrance genetic variants, such as pathogenic variants in the BRCA1/BRCA2 genes associated with hereditary breast and ovarian cancer and the mismatch repair genes associated with Lynch syndrome.

Graph shows relative risk on the x-axis and allele frequency on the y-axis. A line depicts the general finding of a low relative risk associated with common, low-penetrance genetic variants and a higher relative risk associated with rare, high-penetrance genetic variants.

Available genetic testing expands as more genetic variants are identified and their associated cancer risks are characterized.

### Associated Cancers

Cancer risks vary based on the hereditary cancer gene and pathogenic variant involved. For example, P/LP variants in BRCA1 and BRCA2 are associated with breast, ovarian, pancreatic, and other cancers.

### Types of Genetic Variants in the Context of Cancer Genetics

- Germline variant: A variant in a reproductive cell (i.e., egg or sperm) that is in the DNA of every cell in the offspring's body. A variant contained within the germline can be passed from parent to offspring and is, therefore, hereditary.
- Somatic (acquired) variant: In the context of cancer genetics, somatic variant refers to a variant in DNA that occurs before or during tumor development. This type of variant is not present within the germline (i.e., sperm and egg).

[Note: Somatic variants have various nuances, like the concepts of mosaicism, gonadal mosaicism, and clonal hematopoiesis of indeterminate potential.]

For more information about germline genetic testing and somatic genetic testing, see the Clinical Applications section.

### Variant Classifications for Hereditary Cancer Genetic Testing

Variants (i.e., genetic changes) are classified as pathogenic, likely pathogenic, of uncertain significance, benign, or likely benign.[1] Variant classification is based on whether a variant is associated with disease. Genetic variant studies research how variants are associated with specific diseases.

Table 1. Germline Variant Classification for Pathogenicity

Type of Variant | Description
Pathogenic | The variant is expected to affect gene function and is disease-associated. Additional evidence is not expected to alter the classification of this variant (probability of being pathogenic > 0.99). [Note: Not all pathogenic variants are fully penetrant.][2]
Likely pathogenic | The variant is likely expected to affect gene function and is likely disease-associated (probability of being pathogenic, 0.95–0.99).[2]
Uncertain significance | There is not enough information when the variant is evaluated to support a more definitive classification (probability of being pathogenic, 0.05–0.949).[2]
Likely benign | The variant is likely not expected to affect gene function and is likely not disease-associated (probability of being pathogenic, 0.001–0.049).[2]
Benign | The variant is not expected to affect gene function and is not disease-associated (probability of being pathogenic < 0.001).[2]

Adapted from Richards et al.[1]

Variants may be referred to as secondary or incidental findings:

- Secondary findings: Variants found during genetic testing that were intentionally analyzed but are not related to the indication for which the exome or genome sequencing was ordered. These findings may have clinical utility for the ordering physician, the patient, or the patient's family. (Adapted from the American College of Medical Genetics and Genomic [ACMG]'s recommendations for reporting incidental findings in clinical exome and genome sequencing (https://www.ncbi.nlm.nih.gov/pmc/articles/PMC3727274/).) ACMG has adopted secondary findings, rather than incidental findings, as its standard terminology when reporting exome or genome results.
- Incidental findings: Variants that were discovered during genetic testing unintentionally or accidentally.[3]

### Inheritance Patterns for Hereditary Cancer Risk

Hereditary cancer risk is inherited differently, depending on the indicated gene. Most hereditary cancer risks are inherited in an autosomal dominant fashion. In autosomal dominant inheritance, an individual is at risk to develop cancer when he/she inherits one pathogenic variant (in one of the two copies of the gene). Some hereditary cancer syndromes have other inheritance patterns (e.g., MUTYH-associated polyposis is inherited in an autosomal recessive fashion).

For more information about how to recognize hereditary cancer inheritance patterns, see the Analysis of the family history section in Cancer Genetics Risk Assessment and Counseling.

### References

Richards S, Aziz N, Bale S, et al.: Standards and guidelines for the interpretation of sequence variants: a joint consensus recommendation of the American College of Medical Genetics and Genomics and the Association for Molecular Pathology. Genet Med 17 (5): 405-24, 2015.25741868
Plon SE, Eccles DM, Easton D, et al.: Sequence variant classification and reporting: recommendations for improving the interpretation of cancer susceptibility genetic test results. Hum Mutat 29 (11): 1282-91, 2008.18951446
Kalia SS, Adelman K, Bale SJ, et al.: Recommendations for reporting of secondary findings in clinical exome and genome sequencing, 2016 update (ACMG SF v2.0): a policy statement of the American College of Medical Genetics and Genomics. Genet Med 19 (2): 249-255, 2017.27854360

## Identifying Individuals for Hereditary Cancer Genetic Testing

Correctly identifying individuals/families with increased risk of developing cancer is an important role of primary care physicians and other health care providers. Once identified, these individuals can be referred to genetic counseling, where the following can be discussed: risk assessment, possible genetic testing, and developing a management plan. Clues suggesting hereditary cancer risk include the following: an individual/family member is diagnosed with cancer at a young age, cancers in the family exhibit a Mendelian inheritance pattern (most often autosomal dominant inheritance), and multiple primary cancers occur in the same patient/family member. Hereditary cancer can also be a component of a broader syndromic phenotype. For more information about cancer risk assessment and features suggestive of hereditary cancer, see Cancer Genetics Risk Assessment and Counseling.

## Implications of Identifying a Hereditary Predisposition to Cancer

Identifying individuals with increased hereditary cancer risk may inform future cancer screening, surveillance, risk-reducing options, and if applicable, treatment.[1,2] Some examples of these management options include the following:

- Increased frequency of screening and/or screening at an earlier age than that in general population recommendations (e.g., beginning colonoscopy screening before age 45 y).
- Interventions to reduce the risk of developing cancer (e.g., tamoxifen to reduce breast cancer risk, risk-reducing salpingo-oophorectomy to reduce ovarian cancer risk).
- Treatment implications for individuals diagnosed with cancer (i.e., poly [ADP-ribose] polymerases [PARP] inhibitors for breast cancer in individuals with BRCA1/BRCA2 pathogenic/likely pathogenic [P/LP] variants).

A hereditary cancer risk assessment can also inform an individual's future plans (e.g., lifestyle changes, family planning).

Identifying hereditary cancer risk also provides information to an individual’s family members. When an individual has a hereditary cancer P/LP variant, his/her relatives can have targeted genetic testing to search for this specific familial variant. This is known as cascade genetic testing and can help clarify cancer risk in the proband's family members. For more information about cascade genetic testing, see the Cascade Genetic Testing of Family Members section in Cancer Genetics Risk Assessment and Counseling.

Family members who pursue genetic testing can learn either of the following:

- They carry the P/LP variant identified in their family. These patients can discuss appropriate cancer risk-management measures with their medical team.
- They do not carry the P/LP variant identified in their family. Cancer screening for these patients will be based on other cancer risk factors (e.g., environmental exposures, cancer in the family that is not related to the P/LP variant).

### References

National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Colorectal. Version 2.2023 . Plymouth Meeting, PA: National Comprehensive Cancer Network, 2023. Available with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_colon.pdf) Last accessed March 13, 2024.
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 3.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed November 13, 2024.

## Cancer Genetics Risk Assessment and Genetic Counseling

A cancer genetics risk assessment includes an evaluation of an individual’s personal history and family history.[1,2] For detailed information about cancer genetics risk assessment, see Cancer Genetics Risk Assessment and Counseling.

Informed consent is an important part of the genetic testing process. For more information about informed consent, see the Informed Consent section in Cancer Genetics Risk Assessment and Counseling.

Cancer genetics risk assessment and counseling often involves a multidisciplinary team of health professionals. These individuals may include a genetics professional (i.e., genetic counselor, advanced-practice genetics nurse, or medical geneticist), and additional medical experts may also be included (i.e., oncologist, surgeon, and/or internist).

Genetic counseling is a meeting between health care professionals and patients in which patients learn about genetic health and available genetic testing and management options. These health professionals also provide individuals with support, as they attempt to understand and incorporate this genetic information into their daily lives. Genetic counseling generally involves six steps:

1. Medical history and family history assessment.
2. Analysis of genetic information.
3. Communication of genetic information.
4. Education about inheritance, genetic testing, management, risk-reduction options, resources, and research opportunities.
5. Supportive counseling to facilitate informed decision making and adaptation to the risk or condition.
6. Follow-up.

Genetic counselors are health care professionals with highly-specialized training in genetic education and genetic counseling. Genetic counselors help patients make personalized, informed decisions about hereditary risk. Genetic counseling can also be provided by physicians, nurses, or other health care providers who have advanced training in genetics.

A list of practicing Genetic counselors can be found on the National Society of Genetic Counselors' website (https://www.nsgc.org/) and the American Board of Genetic Counseling's website (https://www.abgc.net/).

In some hereditary cancer syndromes, patients develop clinical manifestations that are not related to cancer. In these cases, a medical genetics evaluation may be indicated and conducted by a physician who has completed residency training in the following: 1) a primary care specialty (pediatrics, internal medicine, obstetrics/gynecology, family medicine, etc.), and 2) clinical genetics. A geographic listing of certified clinical geneticists can be obtained on the American College of Medical Genetics and Genomics' website (https://clinics.acmg.net/).

A medical genetics evaluation includes a comprehensive review of the patient’s medical history (from conception to present day), review of medical records, a dysmorphology examination, assessment of the patient's family history, and review of available diagnostic testing (including genetic testing, if warranted). The dysmorphology examination identifies physical features that are characteristic of certain hereditary cancer syndromes but are not necessarily cancerous lesions. For example, this examination may identify unusual skin pigmentation (or other distinct dermatologic findings), small/large head circumference, or other physical differences. A medical geneticist may also play a role in the patient's medical management.

### References

Berliner JL, Cummings SA, Boldt Burnett B, et al.: Risk assessment and genetic counseling for hereditary breast and ovarian cancer syndromes-Practice resource of the National Society of Genetic Counselors. J Genet Couns 30 (2): 342-360, 2021.33410258
Holter S, Hall MJ, Hampel H, et al.: Risk assessment and genetic counseling for Lynch syndrome - Practice resource of the National Society of Genetic Counselors and the Collaborative Group of the Americas on Inherited Gastrointestinal Cancer. J Genet Couns 31 (3): 568-583, 2022.35001450

## Genes and Syndromes Associated With Hereditary Cancer Risk

Cancer type–specific information and hereditary cancer genes/syndromes are discussed in the following PDQ Cancer Genetics summaries:

- Genetics of Breast and Gynecologic Cancers: Includes information on BRCA1/BRCA2, Lynch syndrome (MLH1, MSH2, MSH6, PMS2, EPCAM genes), PALB2, Li-Fraumeni syndrome (TP53 gene), hereditary diffuse gastric cancer (CDH1 gene), moderate-risk genes, and other hereditary breast and gynecologic cancer genes/syndromes.
- Genetics of Colorectal Cancer: Includes information on Lynch syndrome (MLH1, MSH2, MSH6, PMS2, EPCAM genes), familial adenomatous polyposis (APC gene), MUTYH-associated polyposis (MUTYH gene), and other hereditary colorectal cancer genes/syndromes.
- Genetics of Endocrine and Neuroendocrine Neoplasias: Includes information on multiple endocrine neoplasia type 1 (MEN1) (MEN1 gene), MEN2, MEN4 (CDKN1B gene), familial pheochromocytoma and paraganglioma syndrome (SDHA, SDHB, SDHC, SDHD genes and others), Carney-Stratakis syndrome (SDHA, SDHB, SDHC, SDHD genes), and familial nonmedullary thyroid cancer.
- Genetics of Gastric Cancer: Includes information on hereditary diffuse gastric cancer (CDH1 and CTNNA1 genes) and other hereditary gastric cancer syndromes.
- Genetics of Hereditary Hematologic Malignancies: Includes several genes and hereditary syndromes associated with hematologic malignancies.
- Genetics of Renal Cell Carcinoma: Includes information on Von Hippel-Lindau disease (VHL gene), hereditary leiomyomatosis and renal cell cancer (FH gene), hereditary papillary renal carcinoma (MET gene), and Birt-Hogg-Dubé syndrome (FLCN gene).
- Genetics of Prostate Cancer: Includes information on BRCA1/BRCA2, HOXB13, Lynch syndrome (MLH1, MSH2, MSH6, PMS2, EPCAM genes), ATM, and CHEK2.
- Genetics of Skin Cancer: Includes information on several genes and hereditary syndromes associated with basal cell carcinoma (such as basal cell nevus syndrome [PTCH1, SUFU, PTCH2 genes]), squamous cell carcinoma (such as epidermolysis bullosa), and melanoma (such as CDKN2A, MITF, and BAP1 genes).

The following gene/syndrome-specific summaries are also available:

- BRCA1 and BRCA2: Cancer Risks and Management.
- Hereditary Diffuse Gastric Cancer.
- Gastric Adenocarcinoma and Proximal Polyposis of the Stomach (GAPPS).
- Von Hippel-Lindau Disease.
- Hereditary Leiomyomatosis and Renal Cell Cancer.
- Hereditary Papillary Renal Carcinoma.
- Birt-Hogg-Dubé Syndrome.
- RUNX1-Familial Platelet Disorder.
- CEBPA-Associated Familial Acute Myeloid Leukemia.
- DDX41-Associated Myeloid Malignancies.
- GATA2 Deficiency Syndrome.
- Rhabdoid Tumor Predisposition Syndrome Type 1.

## Methods of Genetic Analysis and Gene Discovery

The methods in this section provide a brief background about the genetic analysis and discovery approaches that have been used during the past 10 to 30 years to identify disease susceptibility genes. These methods led to the discovery of important cancer genes like BRCA1, BRCA2, and other breast cancer risk genes. Since then, genetic analysis techniques have transitioned to next-generation sequencing methods, as described in the Clinical Sequencing section of this summary.

### Linkage Analyses

Since it was recognized that cancer clusters in families, investigators have collected data on families with multiple cancer cases. The investigators aimed to localize cancer susceptibility genes via linkage studies.

Linkage studies are typically performed on high-risk kindreds, in whom multiple cases of a particular disease have occurred, in an effort to identify disease susceptibility genes. Linkage analysis statistically compares the genotypes between affected and unaffected individuals. Linkage analysis also seeks evidence that known genetic markers are inherited along with the disease trait. If such evidence is found (linkage), it provides statistical data that the chromosomal region near the known genetic marker also harbors a disease susceptibility gene. Once a genomic region of interest has been identified through linkage analysis, additional studies are required to prove that there truly is a susceptibility gene at this position. Linkage analysis is affected by the following:

- Family size and having enough family members to contribute DNA.
- The number of disease cases in each family.
- Factors related to age at disease onset (e.g., screening use).
- Gender differences in disease risk (not relevant in gender-specific cancers).
- Heterogeneity of disease in cases (e.g., aggressive vs. nonaggressive phenotype).
- The accuracy of family history information.
- Prevalence of phenocopies.

An additional issue in linkage studies is the background rate of sporadic cancer in the context of family studies. For example, because a man’s lifetime risk of prostate cancer is one in eight,[1] it is possible that families under study have both inherited and sporadic prostate cancer cases. Thus, a male may still develop prostate cancer, even if he does not inherit the prostate cancer susceptibility gene that is present in his family. Hence, studies have addressed inconsistencies between linkage data by requiring strict inclusion criteria that define clinically significant disease.[2-6] This approach attempts to define a homogeneous set of cases/families to increase the likelihood of identifying a linkage signal.

### Genome-Wide Association Studies (GWAS)

GWAS are identifying common, low-penetrance susceptibility alleles for many complex diseases,[7] including cancer. This approach can be contrasted with linkage analysis, which searches for genetic-risk variants cosegregating within families that have a high prevalence of disease. While linkage analyses are designed to uncover rare, highly penetrant variants that segregate in predictable heritance patterns (e.g., autosomal dominant, autosomal recessive, X-linked, and mitochondrial), GWAS are best suited to identify multiple, common, low-penetrance genetic polymorphisms. GWAS are conducted under the assumption that the genetic underpinnings of complex phenotypes, such as prostate cancer, are governed by many alleles, each conferring modest risk. Most genetic polymorphisms genotyped in GWAS are common, with minor allele frequencies greater than 1% to 5% within a given population (e.g., men of European ancestry). GWAS capture a large portion of common variation across the genome.[8,9] The strong correlation between many alleles located close to one another on a given chromosome (called linkage disequilibrium) allows one to “scan” the genome without having to test all 10 million known single nucleotide variants (SNVs). With GWAS, researchers can test approximately 1 million to 5 million SNVs per study and ascertain almost all common inherited variants in the genome.

In a GWAS, allele frequency for each SNV is compared between cases and controls. Promising signals—in which allele frequencies deviate significantly in case compared to control populations—are validated in replication cohorts. To have adequate statistical power to identify variants associated with a phenotype, large numbers of cases and controls, typically thousands of each, are studied. Because up to 1 million SNVs are evaluated in a GWAS, false-positive findings are expected to occur frequently when using standard statistical thresholds. Therefore, stringent statistical rules are used to declare a positive finding, usually using a threshold of P < 1 × 10^-7^.[10-12]

To date, thousands of cancer-risk variants have been identified by well-powered GWAS and validated in independent cohorts.[13] These studies have revealed consistent associations between specific inherited variants and cancer risk. However, the findings should be qualified with a few important considerations:

1. GWAS reported thus far have been designed to identify relatively common genetic polymorphisms. It is very unlikely that an allele with high frequency in the population by itself contributes substantially to cancer risk. This, coupled with the polygenic nature of tumorigenesis, means that the contribution by any single variant identified by GWAS to date is quite small, generally with an odds ratio for disease risk of less than 1.3. In addition, despite extensive genome-wide interrogation of common polymorphisms in tens of thousands of cases and controls, GWAS findings to date do not account for even half of the genetic component of cancer risk.[14]
2. Variants uncovered by GWAS are not likely to directly contribute to disease risk. As mentioned above, SNVs exist in linkage disequilibrium blocks and are merely proxies for a set of variants—both known and previously undiscovered—within a given block. The causal allele is located somewhere within that linkage disequilibrium block.
3. Admixture by groups of different ancestry can confound GWAS findings (i.e., a statistically significant finding could reflect a disproportionate number of subjects in the cases versus controls, rather than a true association with disease). Therefore, GWAS are typically powered to analyze a single predominant ancestral group. As a result, some populations remain underrepresented in genome-wide analyses.
4. The clinical relevance of variants identified from GWAS remains unclear. [15 - 17]

Implications of these points and how they relate to polygenic risk scores are discussed further in the Polygenic risk scores for breast and ovarian cancer section in Genetics of Breast and Gynecologic Cancers, the Genetic Polymorphisms and CRC Risk section in Genetics of Colorectal Cancer, and the Common Risk Variants and Polygenic Risk Scores for Prostate Cancer section in Genetics of Prostate Cancer.

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Stanford JL, McDonnell SK, Friedrichsen DM, et al.: Prostate cancer and genetic susceptibility: a genome scan incorporating disease aggressiveness. Prostate 66 (3): 317-25, 2006.16245279
Chang BL, Isaacs SD, Wiley KE, et al.: Genome-wide screen for prostate cancer susceptibility genes in men with clinically significant disease. Prostate 64 (4): 356-61, 2005.15754351
Lange EM, Ho LA, Beebe-Dimmer JL, et al.: Genome-wide linkage scan for prostate cancer susceptibility genes in men with aggressive disease: significant evidence for linkage at chromosome 15q12. Hum Genet 119 (4): 400-7, 2006.16508751
Cancer risks in BRCA2 mutation carriers. The Breast Cancer Linkage Consortium. J Natl Cancer Inst 91 (15): 1310-6, 1999.10433620 99362511
Easton DF, Bishop DT, Ford D, et al.: Genetic linkage analysis in familial breast and ovarian cancer: results from 214 families. The Breast Cancer Linkage Consortium. Am J Hum Genet 52 (4): 678-701, 1993.8460634 93212726
Wellcome Trust Case Control Consortium: Genome-wide association study of 14,000 cases of seven common diseases and 3,000 shared controls. Nature 447 (7145): 661-78, 2007.17554300
The International HapMap Consortium: The International HapMap Project. Nature 426 (6968): 789-96, 2003.14685227
Thorisson GA, Smith AV, Krishnan L, et al.: The International HapMap Project Web site. Genome Res 15 (11): 1592-3, 2005.16251469
Evans DM, Cardon LR: Genome-wide association: a promising start to a long race. Trends Genet 22 (7): 350-4, 2006.16713652
Cardon LR: Genetics. Delivering new disease genes. Science 314 (5804): 1403-5, 2006.17138888
Chanock SJ, Manolio T, Boehnke M, et al.: Replicating genotype-phenotype associations. Nature 447 (7145): 655-60, 2007.17554299
Chang CQ, Yesupriya A, Rowell JL, et al.: A systematic review of cancer GWAS and candidate gene meta-analyses reveals limited overlap but similar effect sizes. Eur J Hum Genet 22 (3): 402-8, 2014.23881057
Ioannidis JP, Castaldi P, Evangelou E: A compendium of genome-wide associations for cancer: critical synopsis and reappraisal. J Natl Cancer Inst 102 (12): 846-58, 2010.20505153
Park JH, Gail MH, Greene MH, et al.: Potential usefulness of single nucleotide polymorphisms to identify persons at high cancer risk: an evaluation of seven common cancers. J Clin Oncol 30 (17): 2157-62, 2012.22585702
Lindström S, Schumacher FR, Cox D, et al.: Common genetic variants in prostate cancer risk prediction--results from the NCI Breast and Prostate Cancer Cohort Consortium (BPC3). Cancer Epidemiol Biomarkers Prev 21 (3): 437-44, 2012.22237985
Wacholder S, Hartge P, Prentice R, et al.: Performance of common genetic variants in breast-cancer risk models. N Engl J Med 362 (11): 986-93, 2010.20237344

## Clinical Sequencing

### Introduction

Broad-scale genome sequencing approaches, including multigene (panel) testing, whole-exome sequencing (WES), and whole-genome sequencing (WGS), are rapidly being developed and incorporated into a spectrum of clinical oncologic settings, including cancer therapeutics and cancer risk assessment. Several institutions and companies offer tumor sequencing, and some are developing precision medicine programs that sequence tumor genomes to identify driver genetic alterations that are targetable for therapeutic benefit to patients.[1-3] Many of these tumor-based approaches use germline DNA sequences as a reference to discriminate between DNA changes only within the tumor and those that are potentially inherited. In the genetic counseling and cancer risk assessment setting, the use of multigene testing to evaluate inherited cancer risk is becoming more common and may become routine in the near future, with institutions and companies offering multigene testing to detect alterations in a host of cancer risk–associated genes.

These advances in gene sequencing technologies also identify variants in genes related to the primary indication for ordering genetic sequence testing, along with findings not related to the disorder being tested. The latter genetic findings, termed incidental or secondary findings, are currently a source of clinical, ethical, legal, and counseling debate. The American College of Medical Genetics and Genomics (ACMG) and the Presidential Commission for the Study of Bioethical Issues have published literature that address some of these issues and provide guidance and recommendations for their use.[4-7] However, controversy continues about when and what results to provide to patients and their health care providers. This section was created to provide information about genomic sequencing technologies in the context of clinical sequencing and highlights additional areas of clinical uncertainty for which further research and approaches are needed.

### Background

DNA sequencing technologies have undergone rapid evolution, particularly since 2005 when massively parallel sequencing, or next-generation sequencing (NGS), was introduced.[8]

Automated Sanger sequencing is considered the first generation of sequencing technology.[9] Sanger cancer gene sequencing uses polymerase chain reaction (PCR) amplification of genetic regions of interest followed by sequencing of PCR products using fluorescently labeled terminators, capillary electrophoresis separation of products, and laser signal detection of nucleotide sequence.[10,11] While this is an accurate sequencing technology, the main limitations of Sanger sequencing include low throughput, a limited ability to sequence more than a few genes at a time, and the inability to detect structural rearrangements.[10]

NGS refers to high throughput DNA sequencing technologies that are capable of processing multiple DNA sequences in parallel.[11] Although platforms differ in template generation and sequence interrogation, the overall approach to NGS technologies involves shearing and immobilizing DNA template molecules onto a solid surface, which allows separation of molecules for simultaneous sequencing reactions (millions to billions) to be performed in a parallel fashion.[10,12] Thus, the major advantages of NGS technologies include the ability to sequence thousands of genes at one time, a lower cost, and the ability to detect multiple types of genomic alterations, such as insertions, deletions, copy number alterations, and rearrangements.[10] Limitations include the possibility that specific gene regions may be missed, turnaround time can be lengthy (although it is decreasing), and informatics support to handle massive amounts of genetic data has lagged behind the sequencing capability. A well-recognized bottleneck to utilizing NGS data is the lack of advanced computational infrastructure to preserve, process, and analyze the vast amount of genetic data. The magnitude of the variants obtained from NGS is exponential; bioinformatics approaches need to evaluate genetic variants for predicted functional consequence in disease biology. There is also a need for user-friendly bioinformatics pipelines to analyze and integrate genetic data to influence the scientific and medical community.[11,13]

### Clinical Applications

NGS has multiple clinical applications. In oncology, the two dominant applications are: 1) the assessment of somatic alterations in tumors to inform prognosis and/or targeted therapeutics; and 2) the assessment of the germline to identify cancer risk alleles.

#### Somatic testing

There are multiple approaches to tumor testing for somatic alterations. With targeted multigene testing, a number of different genes can be assessed simultaneously. These targeted multigene tests can differ substantially in the genes that are included, and they can be tailored to individual tumor types. Targeted multigene testing limits the data to be analyzed and includes only known genes, which makes the interpretation more straightforward than in whole exome or whole genome techniques. In addition, greater depth of coverage is possible with targeted multigene testing than with WES or WGS. Depth of coverage refers to the number of times a nucleotide has been sequenced; a greater depth of coverage has fewer sequencing errors. Deep coverage also aids in differentiating sequencing errors from single nucleotide polymorphisms.

WES and WGS are far more extensive techniques and aim to uncover variants in known genes and in genes not suspected a priori. The discovery of a variant that is unexpected for a particular tumor type can lead to the use of a directed therapeutic, which could improve patient outcome. WES generates sequence data of the coding regions of the genome (representing approximately 1% of the human genome), rather than the entire genome (WGS). Consequently, WES is less expensive than WGS.

Noncoding variants can be identified using WGS but cannot be identified using WES. The use of WGS is limited by cost and the vast bioinformatics needed for interpretation. Although the costs of sequencing have dropped precipitously, the analysis remains formidable.[14]

Although the goal of WES and WGS is to improve patient care by detecting actionable genetic variants (variants that can be targeted therapeutically), a number of issues warrant consideration. This testing may detect pathogenic variants, variants of uncertain significance (VUS), or no detectable abnormalities. In addition, pathogenic variants can be found in genes that are thought to be clearly related to tumorigenesis but can also be detected in genes with unclear relevance (particularly with WES and WGS approaches). VUS have unclear implications as they may, or may not, disrupt the function of the protein. The definition of actionable can vary, but often this term is used when an aberration, if found, would lead to recommendations against certain treatments (such as variants in ras) for which a clinical trial is available, or for which there is a known targeted drug. Although there are case reports of success with this approach, it is unlikely to be straightforward. Studies are ongoing.

Some commercial and single-institution assays test only the tumor. Clearly pathogenic variants found in important genes in the tumor can be somatic but could also be from the germline. In situations in which somatic analysis is paired with a germline analysis, it can be determined whether an identified alteration is inherited. A study that estimated the prevalence of germline variants from patients undergoing tumor sequencing with matched, normal DNA sequencing reported that cancer susceptibility genes were identified in 198 of 1,566 individuals (12.6%). Only 81 of these 198 individuals (40.9%) had pathogenic variants in cancer susceptibility genes concordant with their tumor type. When expanding to include known noncancer-related Mendelian disease genes, 246 of 1,566 individuals (15.7%) had pathogenic or presumed pathogenic germline variants identified.[15]

Sequencing tumors may lead to the identification of hereditary (germline) pathogenic variants.[16] Founder pathogenic variants in well-characterized cancer susceptibility genes are highly suggestive of a germline pathogenic variant. Hypermutated tumor phenotype may suggest an underlying constitutional defect in DNA repair. Clinical characteristics that fit with a particular genetic predisposition, such as family history, young age at diagnosis, or specific tumor type, may also raise the suspicion of a germline variant correlating with a tumor variant. A high variant allele fraction may also indicate a germline variant. All of these factors signify a potential need for patients to undergo genetic counseling and to consider confirmatory germline genetic testing.

The absence of a variant in a gene assessed as part of somatic testing does not rule out the presence of an inherited susceptibility. All patients whose personal and family histories are suggestive of hereditary cancer should consider germline testing regardless of their somatic results.

Ongoing clinical trials, such as the NCI Molecular Analysis for Therapy Choice (NCI-MATCH) Trial (https://www.cancer.gov/about-cancer/treatment/clinical-trials/nci-supported/nci-match), are examining the value of somatic sequencing to find actionable targets. Germline sequencing is occurring as a component of this study.

#### Germline testing

The goal of germline testing is to identify pathogenic variants associated with an inherited risk of cancer and to guide cancer risk–management decisions. Also, germline testing can aid in some management decisions at the time of diagnosis (e.g., decisions about colectomy in Lynch syndrome–related colon cancer and contralateral mastectomy in carriers of BRCA1/BRCA2 pathogenic variants). In addition, there are emerging data that germline status may help determine systemic therapy (e.g., the use of cisplatin or poly [ADP-ribose] polymerase [PARP] inhibitors in BRCA1/BRCA2-related cancer).

Most germline genetic testing has been performed in a targeted manner, looking for variants in the gene(s) associated with a clinical picture (e.g., BRCA1 and BRCA2 in hereditary breast and ovarian cancer or the mismatch repair [MMR] genes in Lynch syndrome). However, targeted multigene tests available commercially or within an institution contain different sets of genes. Some target all cancers, while others target specific cancers (e.g., breast, colon, or prostate cancers). The genes on the multigene tests include high-penetrance genes related to the specific tumor (such as BRCA1/BRCA2 on a breast cancer panel); high penetrance genes related to a different type of cancer but with a more moderate risk for the tumor of reference (such as CDH1 or MSH6 on a breast cancer panel); and moderate penetrance genes for which clinical utility is uncertain (such as NBN on a breast cancer panel). Because multiple genes are included on these panels, it is anticipated that many, and perhaps most, individuals undergoing testing using these panels will be found to have at least one VUS. As it is not possible to do standard pretest counseling models for a panel of 20 genes, new counseling models are needed. Ethical issues of whether patients can opt out of specific results (such as TP53 or CDH1 in breast cancer) and how this would be done in clinical practice are unresolved.

Refer to the Multigene (panel) testing section in the PDQ summary on Cancer Genetics Risk Assessment and Counseling for more information about the use of targeted multigene tests.

WES for inherited cancer susceptibility is also commercially available. Secondary findings are likely, and management of such findings is evolving.

### Governance, Interpretation, and Institutional Oversight of Next-Generation Sequencing (NGS)

The ACCE model uses four main components to evaluate new genetic tests: analytic validity; clinical validity; clinical utility; and ethical, legal, and social issues.[17]

- Analytic validity reflects the accuracy and reliability of the measurement of the genotype.
- Clinical validity refers to how accurately the finding (such a genetic variation) predicts the outcome of interest (such as cancer risk).
- Clinical utility considers whether patient outcome is improved by knowledge of the test result. In 2015, the ACMG issued a policy statement regarding the need to expand the definition of clinical utility to consider the utility of genetic and genomic services for individual patients, families, and society.[5]
- Ethical, legal, and social issues, including informed consent issues, can arise with each new genetic test.

The ACCE model's framework has been adopted worldwide for the evaluation of genetic tests.

Several layers of complexity exist in managing NGS in the clinical setting. At the purely technical level, improvements in the sequencing technique have allowed for sequencing across the entire genome, not merely the exome. As the costs decrease, exomic and genomic sequencing of tumor and normal tissue can be expected to become more routine.

With routine use of WGS, major challenges in interpretation emerge. Foremost is the matter of determining which sequence variations in known cancer predisposition genes are pathologic, which are harmless, and which variations require further evaluation as to their significance. This is not a new challenge. Various groups are developing processes for the interpretation and curation of a growing database of variants and their significance. For example, the International Society for Gastrointestinal Hereditary Tumors has developed such a process for the MMR genes in concert with the Human Variome Project and International Mismatch Repair Consortium.

These processes may serve as a framework for the emerging challenge of interpreting the significance of sequence variations in genes of uncertain or unknown function in regulation of neoplastic progression or other diseases. Larger cancer predisposition multigene tests have been developed by commercial laboratories, with their own process for interpretation. To the extent that increasingly larger multigene tests include genes of unknown significance, governance of the interpretation process requires that academic institutions offering their own multigene tests or using external proprietary panels develop a deliberative process for managing the quality assurance for test performance (including Clinical Laboratory Improvement Amendments [CLIA], where appropriate) and interpretation.

ACMG has issued the following updated guidelines for achieving accountability in interpreting and reporting secondary findings:[4,18]

- Constitutional variants in a list of 56 genes should be reported by the laboratory to the ordering clinician, regardless of the indication for which the clinical sequencing was ordered and regardless of patient age. This includes the normal sample of a tumor-normal sequenced dyad. Patients may opt out of such analysis after clear understanding of the ramifications and full informed consent prior to clinical sequencing.
- Only variants previously reported and a recognized cause of the disorder, or variants previously unreported but of the type expected to cause the disorder, should be reported.
- When clinical genome-scale sequencing is performed, written informed consent should be obtained by a qualified genetics health-care professional describing the nature of the test and addressing issues such as interpretive uncertainty, privacy, familial impact, and generation of secondary findings.
- Clinicians should be familiar with basic attributes and limitations of clinical sequencing.
- ACMG, together with content experts and other professional organizations, should continue to refine and update such guidelines annually.

Concerns remain that the routine reporting of germline variants in the context of tumor sequencing would require laboratories to conduct results review with germline and tumor genome expertise, which would be expected to increase costs, laboratory efforts, and turnaround time for results reporting. The nature of discussions between oncologists and patients would be altered to include the multiple facets involved with germline testing and potential results. Pre- and post-test discussions would also potentially require involvement of genetic counselors and geneticists, who are a limited resource in oncology practices. Recent expert comment stated that more data are needed about the benefits of return of secondary germline findings to cancer patients undergoing tumor sequencing, citing a need for recommendations by experts in the oncology and genetics communities.[19]

It is still very early in the development processes for oversight at the institutional level. As an example, at one high-volume cancer center, the following process has been used:

1. When considering evaluation of tumor tissue for research purposes, patients are asked to consent to undergo tests of very large panels of somatic tissue that are paired with corresponding panels for constitutional tissue. The key research undertakings involve evaluating for differences in prognosis and treatment response according to variant patterns in tumors.
2. The consent process outlines the possibility that variants suggesting underlying tumor susceptibility may be identified. Patients are asked whether they want to receive this information, should an actionable genetic variant be identified. Patients also receive expedited genetic counseling (via counselors associated with the research protocol). If a patient has chosen not to receive such actionable genetic variant information, findings will nevertheless be reported to the patient’s institutional primary care physician (PCP). Unresolved to date are the circumstances in which a patient may be approached again by his or her PCP regarding pertinent findings, notwithstanding a previous decline to receive such information.
3. When potentially significant results are found, the specific test may be repeated in a CLIA lab.
4. A committee was formed to review variants to determine whether they are considered pathogenic or otherwise actionable.
5. A second committee was formed to provide oversight for the conduct of such protocols, in the interest of deliberately evolving the processes above in a manner consistent with the anticipated routine performance of such panels in cancer patients, balanced against the need for patient autonomy and appropriately detailed informed consent.

### Informed Consent Issues Arising From the Application of NGS

Informed consent for the sequencing of highly penetrant disease genes has been conducted since the mid-1990s in the contexts of known or suspected inherited diseases within selected families. However, the best methods and approaches for educating and counseling individuals about the potential benefits, limitations, and harms of genetic testing to facilitate informed decisions have not been fully elucidated or adequately tested. New informed consent challenges arise as NGS technologies are applied in clinical and research settings. Challenges to facilitating informed consent include the following:

- Providing a person-centered appreciation for the breadth and diversity of medical risks potentially identified through genomic sequencing. Establishing informed consent may be particularly challenging in medically underserved populations with less familiarity with the concept of disease risk and in individuals with no previous knowledge, experience, or context of the disease(s) for which they are identified to be at increased risk.
- Sequencing for diseases without clear management algorithms or identified best practices.
- Interpretation of variants of possible but unclear pathogenicity.
- Communicating genetic information that may be of relevance for other family members.
- Additional challenges are anticipated as health care providers not trained in genetic/genomic medicine order and receive results on behalf of their patients with the expectation to return and manage medically actionable results.

The increased availability and decreased cost of NGS technology are expanding the use of genome-wide testing of tumors, with the goal of identifying somatic variants as potential targets for cancer treatment. While identifying germline pathogenic variants may be considered secondary to the main purpose of testing tumors, the possibility of identifying actionable secondary findings of pathogenic variants in cancer predisposition genes supports the need for genetic counseling in this context. Approaches for genetic counseling and informed consent in the context of tumor sequencing have been proposed.[20,21]

### Conclusion

Advances in genetic sequencing technologies have dramatically reduced the cost of sequencing an individual's full genome or exome. WGS and WES are increasingly being employed in the clinical setting in testing for both somatic variants and germline variants. In addition, multigene tests are now available commercially or within an institution. Considerable debate surrounds the clinical, ethical, legal, and counseling aspects associated with NGS and gene panels. Future research is warranted to address these issues.

### References

Dancey JE, Bedard PL, Onetto N, et al.: The genetic basis for cancer treatment decisions. Cell 148 (3): 409-20, 2012.22304912
Meric-Bernstam F, Farhangfar C, Mendelsohn J, et al.: Building a personalized medicine infrastructure at a major cancer center. J Clin Oncol 31 (15): 1849-57, 2013.23589548
Sleijfer S, Bogaerts J, Siu LL: Designing transformative clinical trials in the cancer genome era. J Clin Oncol 31 (15): 1834-41, 2013.23589555
Green RC, Berg JS, Grody WW, et al.: ACMG recommendations for reporting of incidental findings in clinical exome and genome sequencing. Genet Med 15 (7): 565-74, 2013.23788249
ACMG Board of Directors: Clinical utility of genetic and genomic services: a position statement of the American College of Medical Genetics and Genomics. Genet Med 17 (6): 505-7, 2015.25764213
Richards S, Aziz N, Bale S, et al.: Standards and guidelines for the interpretation of sequence variants: a joint consensus recommendation of the American College of Medical Genetics and Genomics and the Association for Molecular Pathology. Genet Med 17 (5): 405-24, 2015.25741868
Presidential Commission for the Study of Bioethical Issues: Anticipate and Communicate: Ethical Management of Incidental and Secondary Findings in the Clinical, Research, and Direct-to-Consumer Contexts. Washington, DC: U.S. Government Printing Office, 2013. Available online. (https://bioethicsarchive.georgetown.edu/pcsbi/sites/default/files/FINALAnticipateCommunicate_PCSBI_0.pdf) Last accessed May 8, 2025.
National Human Genome Research Institute: DNA Sequencing Costs: Data from the NHGRI Genome Sequencing Program (GSP). 2014. Available online (https://www.genome.gov/sequencingcosts/). Last accessed May 8, 2025.
Sanger F, Nicklen S, Coulson AR: DNA sequencing with chain-terminating inhibitors. Proc Natl Acad Sci U S A 74 (12): 5463-7, 1977.271968
MacConaill LE: Existing and emerging technologies for tumor genomic profiling. J Clin Oncol 31 (15): 1815-24, 2013.23589546
Rizzo JM, Buck MJ: Key principles and clinical applications of "next-generation" DNA sequencing. Cancer Prev Res (Phila) 5 (7): 887-900, 2012.22617168
Linnarsson S: Recent advances in DNA sequencing methods - general principles of sample preparation. Exp Cell Res 316 (8): 1339-43, 2010.20211618
Fernald GH, Capriotti E, Daneshjou R, et al.: Bioinformatics challenges for personalized medicine. Bioinformatics 27 (13): 1741-8, 2011.21596790
Mardis ER: The $1,000 genome, the $100,000 analysis? Genome Med 2 (11): 84, 2010.21114804
Schrader KA, Cheng DT, Joseph V, et al.: Germline Variants in Targeted Tumor Sequencing Using Matched Normal DNA. JAMA Oncol 2 (1): 104-11, 2016.26556299
Raymond VM, Gray SW, Roychowdhury S, et al.: Germline Findings in Tumor-Only Sequencing: Points to Consider for Clinicians and Laboratories. J Natl Cancer Inst 108 (4): , 2016.26590952
Haddow J, Palomaki G: A model process for evaluating data on emerging genetic tests. In: Khoury M, Little J, Burke W, eds.: Human Genome Epidemiology: A Scientific Foundation for Using Genetic Information to Improve Health and Prevent Disease. Oxford University Press, 2004, pp 217-33.
ACMG Board of Directors: ACMG policy statement: updated recommendations regarding analysis and reporting of secondary findings in clinical genome-scale sequencing. Genet Med 17 (1): 68-9, 2015.25356965
Parsons DW, Roy A, Plon SE, et al.: Clinical tumor sequencing: an incidental casualty of the American College of Medical Genetics and Genomics recommendations for reporting of incidental findings. J Clin Oncol 32 (21): 2203-5, 2014.24958819
Everett JN, Gustafson SL, Raymond VM: Traditional roles in a non-traditional setting: genetic counseling in precision oncology. J Genet Couns 23 (4): 655-60, 2014.24578120
Catenacci DV, Amico AL, Nielsen SM, et al.: Tumor genome analysis includes germline genome: are we ready for surprises? Int J Cancer 136 (7): 1559-67, 2015.25123297

## Structure and Content of PDQ Summaries

PDQ Cancer Genetics summaries focus on the genetics of specific cancers, inherited cancer syndromes, and the ethical, social, and psychological implications of cancer genetics knowledge. Sections on the genetics of specific cancers include syndrome-specific information on the risk implications of a family history of cancer, the prevalence and characteristics of cancer-predisposing variants, known modifiers of genetic risk, opportunities for genetic testing, outcomes of genetic counseling and testing, and interventions available for people with increased cancer risk resulting from an inherited predisposition.

The source of medical literature cited in PDQ Cancer Genetics summaries is peer-reviewed scientific publications, the quality and reliability of which is evaluated in terms of levels of evidence. Where relevant, the level of evidence is cited, or particular strengths of a study or limitations of the evidence are described.

Refer to the Levels of Evidence for Cancer Genetics Studies summary for more information about the levels of evidence used in the PDQ Cancer Genetics summaries.

## Genetics Resources

Health care providers who deliver genetic services, including genetic counseling, can be located through local, regional, and national professional genetics organizations such as the National Society of Genetic Counselors (https://www.findageneticcounselor.com/). Providers of cancer genetic services are not limited to one specialty and include medical geneticists, genetic counselors, advanced-practice genetics nurses, oncologists (medical, radiation, or surgical), other surgeons, internists, pediatricians, family practitioners, and mental health professionals. A cancer genetics health care provider will assist in constructing and evaluating a pedigree, eliciting and evaluating personal and family medical histories, and calculating and providing information about cancer risk and/or probability of a pathogenic variant being associated with cancer in the family. In addition, if a genetic test is available, these providers can assist in pretest counseling, laboratory selection, informed consent, test interpretation, posttest counseling, and follow-up.

Table 2. Clinical Genetics Information

Resource | Description
ClinGen (https://www.clinicalgenome.org/) | A program to evaluate the clinical relevance of genetic variants for use in precision medicine and research.
ClinVar (https://www.ncbi.nlm.nih.gov/clinvar/) | A public archival database that aggregates information about genomic variation and its relationship to human health.
National Institutes of Health Genetic Testing Registry (GTR) (https://www.ncbi.nlm.nih.gov/gtr/) | Central location for voluntary submission of genetic test information by providers. The scope includes the test's purpose, methodology, validity, evidence of the test's usefulness, and laboratory contacts and credentials.
Online Mendelian Inheritance in Man (OMIM) (https://www.ncbi.nlm.nih.gov/omim) | Catalog of human genes and genetic disorders.

Table 3. Clinical Management Information

Resource | Description
Clinical Practice Guidelines from the American College of Medical Genetics and Genomics (ACMG) (https://www.acmg.net/ACMG/Medical-Genetics-Practice-Resources/Practice-Guidelines.aspx) | Clinical practice guidelines developed by expert panels for risk assessment, testing, and counseling of individuals with various inherited conditions, including some cancers, or individuals with a high risk of developing these conditions.
Clinical Practice Guidelines from the American Society of Clinical Oncology (ASCO) (https://www.asco.org/research-guidelines/quality-guidelines/guidelines) | Clinical practice guidelines developed by expert panels for specific clinical situations (disease-oriented) or use of approved medical products, procedures, or tests (modality-oriented).
Guidelines from the National Comprehensive Cancer Network (NCCN) (https://www.nccn.org/professionals/default.aspx) | Clinical practice guidelines developed by expert panels that detail the sequential management decisions and interventions for the malignant cancers that affect 97% of all patients with cancer. In addition, separate guidelines relate to major prevention and screening topics, and another set of pathways focuses on the major supportive care areas.
National Guideline Clearinghouse from the Agency for Healthcare Research and Quality (AHRQ) (https://www.ahrq.gov/gam/index.html) | A public resource for evidence-based clinical practice guidelines.

Table 4. Consumer/Client: General Information

Resource | Description
Dictionary of Genetics Terms (NCI) (https://www.cancer.gov/publications/dictionaries/genetics-dictionary) | Definitions of more than 200 terms related to genetics.
DNA Learning Center (Cold Spring Harbor Laboratory) (https://dnalc.cshl.edu/) | Variety of educational resources, including an interactive DNA timeline.
The DNA Files (http://www.dnafiles.org/) | Series of 14 one-hour public radio documentaries and related information.
Facing Our Risk of Cancer Empowered (FORCE) (https://www.facingourrisk.org/index.php) | Support and information to individuals and families affected by hereditary breast and ovarian cancer through a toll-free help line, message boards, chat rooms, and support groups.
Genetic and Rare Diseases Information Center (National Human Genome Research Institute [NHGRI]) (https://www.genome.gov/For-Patients-and-Families/Genetic-and-Rare-Diseases-Information-Center) | Information service for the general public, including patients and their families, and for health care professionals and biomedical researchers.
Genetic Science Learning Center (The University of Utah) (https://learn.genetics.utah.edu/) | Information about basic genetics, genetic disorders, genetics in society, and several thematic units.
Genetic Testing for Inherited Cancer Risk (NCI) (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet) | A fact sheet about genetic testing for inherited cancer risk, including types of tests, who should consider testing, how to understand test results, and who has access to a person’s test results. Also contains information about at-home or direct-to-consumer genetic tests.
MedlinePlus: Genetics (National Library of Medicine) (https://medlineplus.gov/genetics/) | Consumer information about genetic conditions and the genes or chromosomes responsible for those conditions.
Talking Glossary of Genomic and Genetic Terms (NHGRI) (https://www.genome.gov/genetics-glossary) | Contains definitions of more than 200 terms related to genetics and a quiz to test your knowledge of genetic terminology. Many terms also have images, animations, and descriptions by specialists in the field of genetics.

Table 5. Ethical, Legal, and Social Implications; Policy; and Legislation Information

Resource | Description
Bioethics Today (https://bioethicstoday.org/) | Links to articles on genetics and bioethics.
DNA Patent Database (https://dnapatents.georgetown.edu/) | Searchable database of U.S. DNA-based patents and patent applications issued by the U.S. Patent and Patent Applications Trademark Office.
Ethical, Legal, and Social Issues (U.S. Department of Energy) (https://doe-humangenomeproject.ornl.gov/ethical-legal-and-social-issues/) | Information, articles, and links on a wide range of genetics issues.
Genetic Information Nondiscrimination Act (GINA) of 2008 (National Human Genome Research Institute [NHGRI]) (https://www.genome.gov/about-genomics/policy-issues/Genetic-Discrimination) | Information describing genetic discrimination and GINA for the public.
Genome Statute and Legislation Database (NHGRI) (https://www.genome.gov/about-genomics/policy-issues/Genome-Statute-Legislation-Database) | Searchable database of state laws/statutes about privacy of genetic information/confidentiality; informed consent; insurance and employment discrimination; genetic testing and counseling; and commercialization and patenting.
HumGen International (http://www.humgen.org/) | Comprehensive international database on the legal, social, and ethical aspects of human genetics.
Bioethics Research Library (Georgetown University) (https://bioethics.georgetown.edu/explore-bioethics/genetics-and-ethics/) | Search engine for literature on specific issues related to ethics and human genetics.
National Society of Genetic Counselors Code of Ethics (https://www.nsgc.org/Policy-Research-and-Publications/Code-of-Ethics-Conflict-of-Interest/Code-of-Ethics) | A statement to clarify and guide the ethical conduct of genetic counselors.
Congress.gov (the Library of Congress) (https://www.congress.gov/) | Searchable database of U.S. legislation (current and previous Congresses).
Your Genes, Your Choices: Exploring the Issues Raised by Genetic Research (https://www.aaas.org/sites/default/files/yourgenes.pdf) | Description of the Human Genome Project, the science behind it, and the ethical, legal, and social issues raised by the project.

Table 6. Family History Tools

Resource | Description
Does it Run in the Family Toolkit (Genetic Alliance) (https://geneticalliance.org/resources-and-information/publications) | Tips for collecting family history information and links to resources.
Family Health History (Centers for Disease Control and Prevention [CDC]) (https://www.cdc.gov/family-health-history/about/index.html) | Website devoted to using family history to promote health. The website includes a link to My Family Health Portrait, a Web-based family history tool.
Family History Resources (National Society of Genetic Counselors) (https://www.aboutgeneticcounselors.org/Reasons-to-See-a-Genetic-Counselor/Exploring-Your-Family-History) | Information on collecting a family health history.
Collecting a Family History (American Medical Association) (https://www.ama-assn.org/delivering-care/precision-medicine/collecting-family-history) | Tools for gathering family history and links to resources.

Table 7. Genetic Research Information

Resource | Description
Chromosomal Variation in Man (https://www.wiley.com/legacy/products/subject/life/borgaonkar/) | Searchable database of literature citations on chromosomal variants and anomalies.
Ensembl (Joint software project between the European Bioinformatics Institute and the Wellcome Sanger Institute) (http://useast.ensembl.org/index.html) | Data sets resulting from an automated genome analysis and annotation process.
Leiden Open Variation Database (http://www.lovd.nl/3.0/home) | A flexible, free tool for gene-centered collection, curation, and display of DNA variation.
KMcancerDB (http://mutationview.jp/MutationView/jsp/mutview/index.jsp?db=cancer) | Human pathogenic variant database with graphical display of molecular information for cancer-related genes.
National Center for Biotechnology Information: Genome (https://www.ncbi.nlm.nih.gov/genome) | Views of chromosomes, maps, and loci; links to other NCBI resources.
Online Mendelian Inheritance in Man (OMIM) (https://www.ncbi.nlm.nih.gov/omim) | Catalog of human genes and genetic disorders.
UCSC Genome Browser (http://genome.cse.ucsc.edu/) | Reference sequence for the human and C. elegans genomes and working drafts for the mouse, rat, Fugu, Drosophila, C. briggsae, yeast, and SARS genomes.
Human Subjects Research in Genomics (National Human Genome Research Institute [NHGRI]) (https://www.genome.gov/about-genomics/policy-issues/Human-Subjects-Research-in-Genomics) | Discusses many issues that continue to challenge institutional review boards, investigators, and policy makers today.

UCSC = University of California, Santa Cruz.

Table 8. Health Professional Practice and Genetics Education Information

Resource | Description
Centre for Genetics Education (https://www.genetics.edu.au/) | Education and service resources for patients and professionals.
DNA Learning Center (https://dnalc.cshl.edu/) | Variety of educational resources, including an interactive DNA timeline.
Essentials of Genetic and Genomic Nursing: Competencies, Curricula Guidelines, and Outcome Indicators, 2nd edition (https://www.genome.gov/Pages/Careers/HealthProfessionalEducation/geneticscompetency.pdf) | Establishes minimum basis to prepare the nursing workforce to deliver competent genetic and genomic-focused nursing care.
Genetics Toolkit (American Society of Clinical Oncology) (https://www.asco.org/practice-policy/cancer-care-initiatives/genetics-toolkit) | A collection of tools and resources to assist oncology professionals with integrating hereditary cancer risk assessment into practice.
Genetics Toolkit (Society of Gynecologic Oncology) (https://www.sgo.org/wp-content/uploads/2020/06/2020_Genetics_toolkit_FULL.pdf) | A series of case studies to illustrate common questions and challenges faced by health professionals and patients with regard to the role of genetics in gynecologic cancers. This resource was developed in collaboration by the Society of Gynecologic Oncology, the National Society of Genetic Counselors, Bright Pink, and Facing Our Risk of Cancer Empowered (FORCE).
Medical School Core Curriculum in Genetics (http://www.meddean.luc.edu/lumen/MedEd/genetics/core_curric.htm) | Medical school course competencies, skills, knowledge, and behaviors that should be covered in a genetics curriculum developed by the Association of Professors of Human and Medical Genetics and the American Society of Human Genetics.
NHS England Genomics Education Programme (https://www.genomicseducation.hee.nhs.uk/) | Develops, provides, and evaluates genetics education opportunities and resources.

Table 9. Professional Organizations: Genetics

Resource | Description
American Board of Genetic Counseling (ABGC) (https://www.abgc.net/Certify/About-the-CGC-Credential) | Information about certification of genetic counselors.
American Board of Medical Genetics and Genomics (ABMGG) (https://www.abmgg.org/) | Information about medical genetic training programs and certification of geneticists.
American College of Medical Genetics and Genomics (ACMG) (https://www.acmg.net/) | Resources, policy statements, and practice guidelines about medical genetics.
American Society of Human Genetics (ASHG) (https://www.ashg.org/) | Resources, projects, and policies concerning human genetics.
Genetics Society of America (GSA) (https://genetics-gsa.org/) | Links to teaching websites, general educational courses, and journals and publications about genetics.
International Society of Nurses in Genetics (ISONG) (https://www.isong.org/) | Resources to help nurses incorporate new knowledge about human genetics into practice, education, and research.
National Society of Genetic Counselors (NSGC) (https://www.nsgc.org/) | Information about genetic counseling: practice guidelines, links to genetic counselors, and genetic discrimination resources.

Table 10. Risk Assessment Information

Resource | Description
Breast Cancer Genetics Referral Screening Tool (B-RST) (https://brcagenescreen.org/) | A screening tool that helps to identify people who may have an increased risk of hereditary breast and ovarian cancers because of their family histories.[1,2]
Breast Cancer Risk Assessment Tool (National Cancer Institute [NCI]) (https://bcrisktool.cancer.gov/) | Interactive tool for estimating a woman's risk of developing invasive breast cancer.
Colorectal Cancer Risk Assessment Tool (NCI) (https://ccrisktool.cancer.gov/) | Interactive tool for estimating the risk of developing colorectal cancer in a non-Hispanic White man or woman aged 50 to 85 years.
Family Health Risk Calculator (The Ohio State University Medical Center) (https://familyhealthlink.osumc.edu/Notice.aspx) | Interactive tool that estimates cancer risk by reviewing patterns of cancer in a family.
Melanoma Risk Assessment Tool (NCI) (https://mrisktool.cancer.gov/) | Interactive tool for estimating an individual’s absolute risk of developing melanoma.

Table 11. Online Pathogenic Variant Prediction Programs

Resource | Description
MRC Human Genetics Unit, Edinburgh (https://webapps.igc.ed.ac.uk/world/research/hnpccpredict/) | Predicts the likelihood of pathogenic variants in one of the MMR genes in persons with colon cancer.
PREMM5 Model: Lynch Syndrome Prediction Model for MLH1, MSH2, MSH6, PMS2, and EPCAM Pathogenic Variants (https://premm.dfci.harvard.edu/) | Estimates the probability that an individual carries a pathogenic variant in the MLH1, MSH2, MSH6, PMS2, or EPCAM gene. This model replaces the PREMM(1,2,6) model.

MMR = mismatch repair; MRC = Medical Research Council.

Table 12. Search Engines Specializing in Genetics and Genomics

Resource | Description
GWAS Catalog (https://www.ebi.ac.uk/gwas/) | An online catalog of SNV-trait associations from published GWAS for use in investigating genomic characteristics of trait/disease-associated SNVs.
HuGE Navigator (https://phgkb.cdc.gov/PHGKB/hNHome.action) | An integrated, searchable knowledge base of genetic associations and human genome epidemiology.
Bioethic Research Library (Georgetown University) (https://bioethics.georgetown.edu/explore-bioethics/genetics-and-ethics/) | Search engine for literature on specific issues related to ethics and human genetics.

GWAS = genome-wide association studies; HuGE = Human Genome Epidemiology; SNV = single nucleotide variant.

Table 13. United States Government Agencies

Resource | Description
Public Health Genomics at the CDC (https://www.cdc.gov/genomics/php/about/index.html) | Information on how human genomic discoveries can be used to improve health and prevent disease, including links to many resources.
National Cancer Institute (https://www.cancer.gov/publications/pdq/information-summaries/genetics) | Summaries of cancer genetics–related information.
National Human Genome Research Institute (https://www.genome.gov/) | Research, policy, ethics, education, and training information and resources about genetic and rare diseases.
U.S. Department of Energy Office of Science (https://genomicscience.energy.gov/) | Genomics educational resources.

### References

Bellcross CA, Lemke AA, Pape LS, et al.: Evaluation of a breast/ovarian cancer genetics referral screening tool in a mammography population. Genet Med 11 (11): 783-9, 2009.19752737
Bellcross C: Further development and evaluation of a breast/ovarian cancer genetics referral screening tool. Genet Med 12 (4): 240, 2010.20395744

## Latest Updates to This Summary (05/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Methods of Genetic Analysis and Gene Discovery

Added American Cancer Society as reference 1.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about cancer genetics. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Cancer Genetics Overview. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/overview-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389204]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).